# Levels of Evidence for Supportive and Palliative Care Studies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the formal ranking system used by the PDQ Editorial Boards to assess evidence supporting the use of specific interventions or approaches. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

The PDQ supportive and palliative care information summaries (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care) provide descriptions of the pathophysiology and treatment of common physical and psychosocial complications of cancer and its treatment, including complications such as pain, anxiety, depression, fatigue, and nausea and vomiting. Each PDQ health professional summary generally includes an overview; information about etiology, assessment, and management; and citations to published medical literature.

The supportive and palliative care of cancer patients and their informal caregivers can involve the identification and mitigation of physiological, psychological, and spiritual needs.

1. Physiological complications addressed in the PDQ supportive and palliative care summaries include the following:
  - Cardiopulmonary syndromes.
  - Hot flashes and night sweats.
  - Gastrointestinal complications.
  - Lymphedema.
  - Nausea and vomiting.
  - Oral complications.
  - Pain.
  - Dermatological problems.
  - Sleep abnormalities.
  - Malnutrition.
  - Fatigue.
  - Cachexia.
2. Psychological and behavioral complications addressed in the PDQ supportive and palliative care summaries include the following:
  - Cancer-related anxiety.
  - Cancer-related post-traumatic stress.
  - Cognitive disorders.
  - Depression.
  - Normal adjustment issues and adjustment disorders.
  - Nutrition/weight management.
  - Psychosocial distress.
3. Spiritual and religious concerns addressed in the PDQ supportive and palliative care summaries include the following:
  - Spiritual experience.
  - Religious beliefs.
  - Approaches to addressing these issues.
4. Planning for end of life and anticipating end-of-life symptoms and needs addressed in the PDQ supportive and palliative care summaries include the following:
  - End-of-life care decisions.
  - Supportive care.
  - Palliative care.
  - Hospice care.
  - Patient-oncologist communication.
  - Grief issues.

References cited in the PDQ supportive and palliative care information summaries are drawn primarily from peer-reviewed biomedical literature. The quality and reliability of such published reports can vary considerably. To help readers assess the strength of findings from clinical research studies, levels-of-evidence rankings are often employed. These rankings generally take into account the strength of a study’s design and the strength of the clinical outcome(s) measured. Clinical research in supportive and palliative care is feasible in some settings but difficult to conduct in others, such as at the end of life. Furthermore, as in other areas of medicine, supportive and palliative care decisions must be made in the context of existing evidence, which may be weaker than ideal.

In general, the quality of evidence depends on:

- The appropriateness of the study to the question being asked.
- How well the study was designed, implemented, analyzed, and interpreted.

For evaluating outcomes of both medical and psychosocial interventions, the strongest evidence is obtained from well-designed, well-conducted randomized clinical trials. For evaluating other questions, particularly those related to symptom management, well-designed descriptive studies may provide the strongest evidence practicable. Particular elements of study design, such as the nature of the population being studied or the duration of observation, may be crucial to assessing the quality of a study. Reviews of studies will indicate the level of evidence and any confounding design issues.

During the early phases of research in a new area, information relevant to the needs of patients and clinicians may come from a limited number of reports and data of varying strength. This information may include evidence from:

- Well-designed prospective studies (e.g., randomized trials, nonrandomized trials, cohort studies, and case series).
- Cross-sectional studies (e.g., correlational designs using various levels of analytic sophistication).
- Retrospective studies (e.g., case-control studies, case series, and case reports).

The studies may be interventional, may be observational, or may involve provider or patient self-reports or record reviews.

In some cases, the best available evidence may reflect clinical/professional experience or expert consensus opinion. All sources may yield information relevant to patients and clinicians, who may be required to make management decisions before the best possible evidence is available.

In view of this complexity, the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care) took a pragmatic approach to defining the levels of evidence that it would use. The levels used by the Board focus primarily on the strength of a study’s design as appropriate to the questions being investigated. These levels should be easily understood by health professionals and serve as a starting point for discussing the strength of study results.

## Study Design Categories, Definitions, and Levels of Evidence

I. Prospective, randomized, controlled trials and meta-analyses of prospective, randomized, controlled trials.
  The randomized, double-blinded, controlled trial is the gold standard of study design. To achieve this ranking, the study allocation must be blinded to the investigator both before and after the randomization and the assignment to intervention group. This design provides protection from allocation bias by the investigator and from bias in the assessment of outcomes by both the investigator and the patient.
  Unfortunately, double-blinding after intervention assignment is not always possible because procedures or side effects often vary substantially among study interventions in ways that are obvious to both the investigator and the patient. In some cases, however, it should be possible to blind the investigator and the patient until the randomization has been made, even if intervention delivery cannot be blinded. Furthermore, randomized trials are still subject to imbalances if sample size is inadequate to the question of interest, and they may be less than optimal owing to other design elements such as choice of sample, measurement approach, appropriateness of the comparison condition, or loss to follow-up.
  Meta-analysis of randomized studies offers a quantitative synthesis of previously conducted studies. The strength of the evidence from a meta-analysis is based on the quality of the individual studies included. Moreover, meta-analyses can magnify small systematic errors in individual studies.
  Because the results of meta-analyses and the randomized trials they are based on do not always agree, and because meta-analyses performed by different investigators to address the same issue can reach contradictory conclusions, meta-analyses of randomized studies are placed in the same category of strength of evidence as are randomized studies, not at a higher level.
II. Prospective, nonrandomized, controlled trials; prospective cohort studies; prospective case series; and cross-sectional studies.
  In nonrandomized controlled trials, allocation to intervention group is made on the basis of:
  - Birth date.
  - Chart number.
  - Bed availability.
  - Day of clinic appointment.
  - Any other strategy known to the investigator before informed consent is obtained from the patient.
  Imbalances can occur in intervention allocations under such circumstances but can also be taken into account statistically.
  A prospective cohort study is a longitudinal study in which a defined group of individuals who share a certain condition and/or who are exposed to a particular intervention are followed over time and compared with another group of individuals who are not exposed to the intervention under study. The general population from which the cohort is drawn or another cohort can be used as the comparison group. Alternatively, subgroups within a cohort can be compared with each other.
  A prospective case series is an uncontrolled study involving either consecutive cases or nonconsecutive cases. Although the evidence from this type of study is weaker than that from a controlled study, this design may be the only one practical in certain settings. Evidence from a consecutive case series is considered stronger than that from a nonconsecutive case series, and population-based series drawn from a well-defined population are stronger than non–population-based series.
  Cross-sectional/correlational studies are widely used to investigate the relationship among variables in one or more groups of individuals. Depending on the research question, they may be the highest level of design possible and may even be the most appropriate to examine the relationships among multiple variables. Analytic strategies, including multivariate approaches, need to be matched to the question at issue. A combination of cross-sectional and longitudinal data collection can be explored with very sophisticated path analytic approaches, with the imputation of causality. Quality can nevertheless vary considerably, depending on:
  - Choice of measurement.
  - Adequacy of sample size.
  - Representativeness of sample.
  - Quality of statistical analysis.
III. Retrospective studies.
  Retrospective studies include:
  - Case-control studies.
  - Retrospective case studies.
  - Individual case reports.
  In case-control studies, two groups of individuals—one with a disease or condition (cases) and a similar group without the disease or condition (controls)—are compared. The cases should be representative of all cases in a population but do not have to include all cases in a population. The controls should come from the same population as the cases.
  Retrospective studies are prone to numerous biases, including selection bias and lack of information about confounding variables from medical records or memories of the study participants (recall bias). Incident cases are preferable to prevalent cases to help reduce bias.
  Evidence obtained from retrospective studies, especially case reports, is among the weakest forms of evidence. However, systematic qualitative research, while often retrospective in nature, improves substantially on anecdotal case reports.
IV. Opinions of respected authorities based on clinical experience, consensus statements from expert committees, or authoritative reviews.
  The evidence supporting conclusions or recommendations in opinions, consensus statements, or authoritative reviews can be highly variable and subject to important biases. This category of evidence is usually considered the lowest in many levels-of-evidence rankings.

## Latest Updates to This Summary (07/13/2021)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the formal ranking system used by the PDQ Editorial Boards to assess evidence supporting the use of specific interventions or approaches. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Levels of Evidence for Supportive and Palliative Care Studies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/levels-evidence/supportive-care. Accessed <MM/DD/YYYY>. [PMID: 26389413]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).